# Lymphedema (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the pathophysiology and treatment of lymphedema. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## Overview

Lymphedema occurs when disruption of normal lymphatic drainage leads to accumulation of protein-rich lymph fluid in the interstitial space. Cancer survivors who experience lymphedema report poor physical functioning, impaired ability to engage in normal activities of daily living, and increased psychological distress.[1-5]

Estimates of the prevalence of lymphedema vary widely due to differences in the type of cancer, measurement methods, diagnostic criteria, and timing of evaluations relative to cancer diagnosis and treatment. In a survey conducted in 2006 and 2010, 6,593 cancer survivors were asked to identify ongoing concerns. Approximately 20% of respondents reported concerns related to lymphedema. Of these individuals, 50% to 60% reported receiving care for lymphedema.[6] These results align reasonably well with a survey study of women survivors of ovarian, endometrial, and colorectal cancers, who met criteria for lymphedema based on a validated survey that demonstrated a point prevalence of 37%, 33%, and 31%, respectively.[3] Similarly, a randomized intervention study in women with breast cancer demonstrated, by limb volume measurements or physician diagnosis, that 42% of subjects had lymphedema at 18 months after surgery.[7][Level of evidence: I]

Lymphedema is a common delayed effect of cancer treatment that negatively impacts survivors' quality of life. This summary reviews the anatomy of the lymphatic system, the pathophysiology of lymphedema secondary to cancer, and epidemiology. The summary also provides clinicians with information related to risk factors, diagnosis, prevention, and treatment. The summary does not deal with congenital lymphedema or lymphedema not related to cancer.

In this summary, unless otherwise stated, evidence and practice issues as they relate to adults are discussed. The evidence and application to practice related to children may differ significantly from information related to adults. When specific information about the care of children is available, it is summarized under its own heading.

### Anatomy of the Lymphatic System

The human lymphatic system generally includes superficial or primary lymphatic vessels that form a complex dermal network of capillary-like channels. Primary lymphatic vessels lack muscular walls and do not have valves. They drain into larger, secondary lymphatic vessels located in the subdermal space. Secondary lymphatic vessels run parallel to the superficial veins and drain into deeper lymphatic vessels located in the subcutaneous fat adjacent to the fascia. Unlike the primary vessels, the secondary and deeper lymphatic vessels have muscular walls and numerous valves to accomplish active and unidirectional lymphatic flow.

An intramuscular system of lymphatic vessels that parallels the deep arteries and drains the muscular compartment, joints, and synovium also exists. The superficial and deep lymphatic systems probably function independently, except in abnormal states, although there is evidence that they communicate near lymph nodes.[8] Lymph drains from the lower limbs into the lumbar lymphatic trunk. The lumbar lymphatic trunk joins the intestinal lymphatic trunk and cisterna chyli to form the thoracic duct, which empties into the left subclavian vein. The lymphatic vessels of the left arm drain into the left subclavian lymphatic trunk and then into the left subclavian vein. The lymphatic vessels of the right arm drain into the right subclavian lymphatic trunk and then into the right subclavian vein.

The lymph system is part of the body's immune system and is made up of tissues and organs that help protect the body from infection and disease. These include the tonsils, adenoids (not shown), thymus, spleen, bone marrow, lymph vessels, and lymph nodes. Lymph tissue is also found in many other parts of the body, including the small intestine.

Lymphatic system; drawing shows the lymph vessels and lymph organs, including the lymph nodes, tonsils, thymus, spleen, and bone marrow. Also shown is the small intestine (one site of mucosal-associated lymphoid tissue). There are also two pullouts: one showing a close up of the inside structure of a lymph node and the attached artery, vein, and lymph vessels with arrows showing how the lymph (clear, watery fluid) moves into and out of the lymph node, and another showing a close up of bone marrow with blood cells.

### Pathophysiology of Lymphedema

Body fluids can be discussed in terms of their composition and the specific fluid compartment where they are located. Intracellular fluid includes all fluid enclosed by the plasma membranes of cells. Extracellular fluid (ECF) surrounds all cells in the body. ECF has two primary constituents: intravascular plasma and the interstitial fluid that surrounds all cells not in the plasma. Lymphedema is the abnormal accumulation of protein-rich fluid in the interstitial space that is accompanied by inflammation and, eventually, fibrosis.

The formation of interstitial fluid comes from the movement of intravascular fluid across the capillary membranes due to arteriolar blood pressure. Much of the interstitial fluid returns to the intravascular fluid via the postcapillary venules. The dynamics of fluid production are influenced by arterial and venous hydrostatic pressures, tissue pressure, oncotic pressures of the intravascular and interstitial fluid, and membrane permeability. Normally, the dynamics favor a net gain of interstitial fluid, with the excess removed via lymphatic channels. Because lymphatic vessels often lack a basement membrane, they can resorb molecules too large for venous uptake as well. In short, the lymphatic system controls the pressure, volume, and composition of the interstitial fluid.

Lymphatic obstruction leads to increased interstitial fluid, which often contains large proteins and cellular debris. Through mechanisms not fully understood, the increased interstitial fluid induces inflammation, destruction or sclerosis of the lymphatic vessels, fibrosis, and, ultimately, adipose tissue hypertrophy.

The lymphatic vessels normally maintain normal interstitial pressures by removing the excess interstitial fluid that results from the imbalance between the intravascular fluid that enters from the arterioles and exits into the venules. Large proteins and cells that cannot exit the interstitial space through the venules leave the interstitial fluid through the lymphatic vessels. As the lymph moves through the lymphatic vessels, it passes through lymph nodes and eventually into one of two lymphatic ducts that empty into a large vein near the heart. In lymphedema, the flow of lymph through the lymphatic vessels is disrupted or blocked. This leads to increased interstitial pressure and an accumulation of interstitial fluid, large proteins, and cellular debris in the interstitial space, which induces inflammation. The inflammation may cause further damage to the lymphatic vessels. The macrophages and lymphocytes release inflammatory markers, which causes fibrosis, fat cell hypertrophy, and the classical sign of swelling. Lymphedema may be caused by cancer or cancer treatment.

Lymphedema; the top part of the drawing shows normal lymphatic flow. An arrow is used to show intravascular fluid flowing through an artery, an arteriole, and a capillary bed, where the fluid leaks out into the interstitial space around the cells and then exits through the venules. Also shown is interstitial fluid, large proteins, and cells entering a lymphatic vessel to maintain normal interstitial pressure. The fluid in the lymphatic vessel is called lymph. Also shown is the inside structure of a lymph node attached to the lymphatic vessel with arrows showing how the lymph moves into and out of the lymph node. The lymphatic ducts in the neck area of a female figure are also shown. The figure’s left arm is red and swollen. There is a pull-out from the swollen arm showing a top layer of red, hardened skin and an inset box showing obstructed lymphatic flow. A damaged lymphatic vessel resulting in increased interstitial pressure and a build-up of large proteins, cellular debris, macrophages, and lymphocytes are shown. Large fat cells and fibrosis are also shown in the inset box.

### Epidemiology and Risk Factors

Accurate estimates of the incidence and prevalence of lymphedema are difficult to provide, due in part to differences in the definition of lymphedema (e.g., patient self-reports vs. objective volume measurements) and the timing of assessment for lymphedema relative to cancer treatment. Other factors are differences in surgical techniques related to the type of lymph node dissection or the total dose, fractions, and field of radiation administered.

Common risk factors for developing lymphedema include the following:

- Extent of local surgery.
- Anatomical location of lymph node dissection.
- Radiation to lymph nodes.
- Localized infection or delayed wound healing.
- Tumor causing lymphatic obstruction of the anterior cervical, thoracic, axillary, pelvic, or abdominal nodes.
- Intrapelvic or intra-abdominal tumors that involve or directly compress lymphatic vessels and/or the cisterna chyli and thoracic duct.
- Having a higher disease stage.
- Overweight (body mass index [BMI] ≥25 kg/m^2^) or obesity (BMI ≥30 kg/m^2^).[9]
- Black race and Hispanic ethnicity.[10]
- Rurality.[10]

### References

Ridner SH: Quality of life and a symptom cluster associated with breast cancer treatment-related lymphedema. Support Care Cancer 13 (11): 904-11, 2005.15812652
Dunberger G, Lindquist H, Waldenström AC, et al.: Lower limb lymphedema in gynecological cancer survivors--effect on daily life functioning. Support Care Cancer 21 (11): 3063-70, 2013.23812496
Zhang X, McLaughlin EM, Krok-Schoen JL, et al.: Association of Lower Extremity Lymphedema With Physical Functioning and Activities of Daily Living Among Older Survivors of Colorectal, Endometrial, and Ovarian Cancer. JAMA Netw Open 5 (3): e221671, 2022.35262713
Pyszel A, Malyszczak K, Pyszel K, et al.: Disability, psychological distress and quality of life in breast cancer survivors with arm lymphedema. Lymphology 39 (4): 185-92, 2006.17319631
Gjorup CA, Groenvold M, Hendel HW, et al.: Health-related quality of life in melanoma patients: Impact of melanoma-related limb lymphoedema. Eur J Cancer 85: 122-132, 2017.28918186
Beckjord EB, Reynolds KA, van Londen GJ, et al.: Population-level trends in posttreatment cancer survivors' concerns and associated receipt of care: results from the 2006 and 2010 LIVESTRONG surveys. J Psychosoc Oncol 32 (2): 125-51, 2014.24364920
Paskett ED, Le-Rademacher J, Oliveri JM, et al.: A randomized study to prevent lymphedema in women treated for breast cancer: CALGB 70305 (Alliance). Cancer 127 (2): 291-299, 2021.33079411
Horsley JS, Styblo T: Lymphedema in the postmastectomy patient. In: Bland KI, Copeland EM, eds.: The Breast: Comprehensive Management of Benign and Malignant Diseases. Saunders, 1991, pp 701-6.
McLaughlin SA, Brunelle CL, Taghian A: Breast Cancer-Related Lymphedema: Risk Factors, Screening, Management, and the Impact of Locoregional Treatment. J Clin Oncol 38 (20): 2341-2350, 2020.32442064
Montagna G, Zhang J, Sevilimedu V, et al.: Risk Factors and Racial and Ethnic Disparities in Patients With Breast Cancer-Related Lymphedema. JAMA Oncol 8 (8): 1195-1200, 2022.35679026

## Disease-Specific Lymphedema

### Breast Cancer

A systematic review found the prevalence of lymphedema to be 21.4% (14.9%–29.8%) in patients with breast cancer.[1] The incidence increased for up to 2 years after breast cancer diagnosis or surgery, and it was higher in women who underwent axillary lymph node dissection versus sentinel lymph node biopsy (19.9% vs. 5.6%). As a result, omission of axillary dissection in women with an involved sentinel lymph node is now an accepted practice. This practice is a result of a phase III randomized study (ACOSOG-Z0011) (https://www.cancer.gov/clinicaltrials/NCT00003855) that showed no difference in overall survival in women who did not undergo a complete axillary dissection, compared with those who did.[2] Additional risk factors for lymphedema development included greater number of lymph nodes dissected, having a mastectomy, and overweight or obesity.[1,3] In a prospective study of neoadjuvant chemotherapy followed by axillary lymph node dissection (ACOSOG-Z1071) (https://www.cancer.gov/clinicaltrials/NCT00881361), the incidence of lymphedema after a median follow-up of 3 years was 37.8% (95% confidence interval [CI], 33.1%–43.2%). Increasing body mass index (BMI) (hazard ratio [HR], 1.04; 95% CI, 1.01–1.06), duration of neoadjuvant chemotherapy (HR, 1.48; 95% CI, 1.01–2.17), number of lymph nodes removed, and number of involved lymph nodes were associated with lymphedema symptoms.[4]

Several risk factors for breast cancer–related lymphedema (BCRL) were demonstrated in a study using data from a 2-year, prospective observational study of 304 patients with breast cancer who had axillary lymph node dissection and radiation therapy. The cumulative incidence of lymphedema was measured by a more than 10% increase in arm volume, and univariate and multivariable analyses were performed. On multivariable analysis, Black race and Hispanic ethnicity (odds ratio [OR], 3.88; 95% CI, 2.14–7.08, and OR, 3.01; 95% CI, 1.10–7.62, respectively; P < .001 for each), receipt of neoadjuvant chemotherapy (OR, 2.10; 95% CI, 1.16–3.95; P = .01), older age (OR, 1.04; 95% CI, 1.02–1.07 per 1-year increase; P = .001), and a longer follow-up interval (OR, 1.57; 95% CI, 1.30–1.90 per 6-month increase; P < .001) were independently associated with an increased risk.[5][Level of evidence: II]

Another study examined risk factors for BCRL related to treatment, comorbidities, and lifestyle in 918 women enrolled in a Prospective Surveillance and Early Intervention (PSEI) trial. Women were randomly assigned to either bioimpedance spectroscopy (BIS) or tape measurement (TM).[6] In a secondary analysis, risk factors were used to test for factor associations with outcomes (no lymphedema, subclinical lymphedema, progression to chronic lymphedema after intervention, progression to chronic lymphedema without intervention). Factors associated with BCRL risk included axillary lymph node dissection (P < .001), taxane-based chemotherapy (P < .001), regional nodal irradiation (P ≤ .001), BMI greater than 30 (P = .002), and rurality (P = .037).[6]

### Gynecological Cancers

A cohort study supports the evidence that a significant proportion of women experience lower-limb lymphedema after treatment of gynecological cancer or colorectal cancer. The highest prevalence (36.5%) among ovarian cancer survivors, followed by endometrial cancer survivors (32.5%) and colorectal cancer survivors (31.4%).[7]

In one study, 802 of 1,774 women diagnosed with a gynecological cancer between 1999 and 2004 responded to a survey about lymphedema.[8] Twenty-five percent of the respondents reported lower-extremity edema; 10% had been diagnosed with lymphedema. Most respondents (75%) had been diagnosed with these conditions within the first year of a cancer diagnosis. Women with vulvar cancer were most likely to have symptoms (36%). Lymph node dissection increased the risk of symptoms in women with cervical cancer but not uterine cancer. The range of symptoms included heavy legs, pain, and skin tightness. Standing all day, long-distance travel, and hot weather were precipitating conditions. The most common treatments were compression garments, massage, and lymphatic exercises. The findings related to high prevalence in patients with vulvar cancer and occurrence of symptoms within the first year have been verified.[9]

Serial limb volume measurements were obtained from a cohort of women who underwent a lymph node dissection for vulvar (n = 42), endometrial (n = 734), or cervical (n = 138) cancer 4 to 6 weeks after surgery and then every 3 months.[10] The incidence of an increase in limb volume of more than 10% was 43% for vulvar cancer, 34% for endometrial cancer, and 33% for cervical cancer. The incidence of severe lymphedema (>40% increase in volume) was less than 2% in all cohorts. The peak incidence was at the 4- to 6-week time point, but new cases were identified at all time points. The risk-factor analysis identified a reduced risk in women older than 65 years and a higher risk in women who had more than eight lymph nodes removed in the endometrial cohort.

### Head and Neck Cancer

Patients with head and neck cancer are susceptible to external and internal lymphedema. External lymphedema typically presents with submental edema or lower neck swelling. Internal lymphedema is more widely distributed in the anatomical regions of the oropharynx. In a small cross-sectional study with video-assisted examinations, 59 of 61 patients had some degree of lymphedema.[11][Level of evidence: II] Sixty-one percent of the patients had only internal lymphedema, 35% had internal and external lymphedema, and 4% had only external lymphedema. Postoperative radiation therapy was a risk factor for combined lymphedema. Chemotherapy was a risk factor for patients with internal lymphedema only.

### Melanoma

One single-center, cross-sectional study reported on lymphedema after either sentinel lymph node biopsy or lymph node dissection in 435 patients who were treated for melanoma between 1997 and 2015.[12] The authors reported a lymphedema prevalence of 25%. Forty-eight patients (44%) had International Society of Lymphology (ISL) stage I lymphedema (pitting edema), and 61 patients (56%) had ISL stage II or III lymphedema. Multivariate analyses identified as potential predictive factors the primary site of disease on the affected limb, inguinal surgery, and persistent pain at the site of lymph node surgery. Limb cellulitis was a risk factor for ISL stage II and III lymphedema. The same investigators also reported on health-related quality of life in an earlier publication. In another smaller, single-institution, retrospective study of 66 patients who underwent therapeutic nodal dissection, the rate of permanent lymphedema for inguinal node dissection was 38%, compared with 12% for axillary node dissection.[13] Another potentially relevant variable is the type of dissection. A 2017 systematic review did not find an appreciable difference between the rate of lymphedema after therapeutic lymphadenectomy and completion of lymph node sampling after a positive sentinel lymph node biopsy.[14] In both instances, the rate was around 20%.

### Prostate Cancer

There are few studies of lymphedema after prostate cancer therapy. A small cross-sectional survey of men who underwent radical prostatectomy reported that 19 of 54 respondents (35.2%) had bilateral lower-extremity lymphedema.[15][Level of evidence: II] Of note, 25 respondents reported that they had received manual lymphatic drainage therapy. Men who did not experience regression experienced more distress related to physical and mental functioning than those who did. An elevated BMI and poor general health were risk factors for lymphedema.

### Sarcoma

One study measured patient demographics, surgical outcomes data, functional outcomes, and lymphedema severity with a validated scale for 289 patients who underwent limb preservation surgery of an extremity sarcoma between 2000 and 2007.[16] The mean time from surgery was 35 months (range, 12–60 months). Eighty-three patients had some degree of lymphedema, including 58 with mild but definite swelling, 22 with moderate swelling, and 3 with considerable swelling. No patients had grade 4 or very severe swelling with shiny skin and skin cracking. Univariate analysis demonstrated that radiation therapy, tumor size, and tumor depth correlated with severity. The location of the sarcoma (upper or lower extremity), lymph node dissection (yes or no), and BMI did not correlate with severity. Multivariable analysis demonstrated that tumor size was the only independent predictor.

### References

DiSipio T, Rye S, Newman B, et al.: Incidence of unilateral arm lymphoedema after breast cancer: a systematic review and meta-analysis. Lancet Oncol 14 (6): 500-15, 2013.23540561
Giuliano AE, Ballman KV, McCall L, et al.: Effect of Axillary Dissection vs No Axillary Dissection on 10-Year Overall Survival Among Women With Invasive Breast Cancer and Sentinel Node Metastasis: The ACOSOG Z0011 (Alliance) Randomized Clinical Trial. JAMA 318 (10): 918-926, 2017.28898379
McLaughlin SA, Brunelle CL, Taghian A: Breast Cancer-Related Lymphedema: Risk Factors, Screening, Management, and the Impact of Locoregional Treatment. J Clin Oncol 38 (20): 2341-2350, 2020.32442064
Armer JM, Ballman KV, McCall L, et al.: Factors Associated With Lymphedema in Women With Node-Positive Breast Cancer Treated With Neoadjuvant Chemotherapy and Axillary Dissection. JAMA Surg 154 (9): 800-809, 2019.31314062
Montagna G, Zhang J, Sevilimedu V, et al.: Risk Factors and Racial and Ethnic Disparities in Patients With Breast Cancer-Related Lymphedema. JAMA Oncol 8 (8): 1195-1200, 2022.35679026
Koelmeyer LA, Gaitatzis K, Dietrich MS, et al.: Risk factors for breast cancer-related lymphedema in patients undergoing 3 years of prospective surveillance with intervention. Cancer 128 (18): 3408-3415, 2022.35797441
Zhang X, McLaughlin EM, Krok-Schoen JL, et al.: Association of Lower Extremity Lymphedema With Physical Functioning and Activities of Daily Living Among Older Survivors of Colorectal, Endometrial, and Ovarian Cancer. JAMA Netw Open 5 (3): e221671, 2022.35262713
Beesley V, Janda M, Eakin E, et al.: Lymphedema after gynecological cancer treatment : prevalence, correlates, and supportive care needs. Cancer 109 (12): 2607-14, 2007.17474128
Ryan M, Stainton MC, Slaytor EK, et al.: Aetiology and prevalence of lower limb lymphoedema following treatment for gynaecological cancer. Aust N Z J Obstet Gynaecol 43 (2): 148-51, 2003.14712972
Carter J, Huang HQ, Armer J, et al.: GOG 244 - The LymphEdema and Gynecologic cancer (LEG) study: The association between the gynecologic cancer lymphedema questionnaire (GCLQ) and lymphedema of the lower extremity (LLE). Gynecol Oncol 155 (3): 452-460, 2019.31679787
Jeans C, Brown B, Ward EC, et al.: Comparing the prevalence, location, and severity of head and neck lymphedema after postoperative radiotherapy for oral cavity cancers and definitive chemoradiotherapy for oropharyngeal, laryngeal, and hypopharyngeal cancers. Head Neck 42 (11): 3364-3374, 2020.32735033
Gjorup CA, Groenvold M, Hendel HW, et al.: Health-related quality of life in melanoma patients: Impact of melanoma-related limb lymphoedema. Eur J Cancer 85: 122-132, 2017.28918186
Deban M, Vallance P, Jost E, et al.: Higher Rate of Lymphedema with Inguinal versus Axillary Complete Lymph Node Dissection for Melanoma: A Potential Target for Immediate Lymphatic Reconstruction? Curr Oncol 29 (8): 5655-5663, 2022.36005184
Moody JA, Botham SJ, Dahill KE, et al.: Complications following completion lymphadenectomy versus therapeutic lymphadenectomy for melanoma - A systematic review of the literature. Eur J Surg Oncol 43 (9): 1760-1767, 2017.28756017
Neuberger M, Schmidt L, Wessels F, et al.: Onset and burden of lower limb lymphedema after radical prostatectomy: a cross-sectional study. Support Care Cancer 30 (2): 1303-1313, 2022.34477972
Friedmann D, Wunder JS, Ferguson P, et al.: Incidence and Severity of Lymphoedema following Limb Salvage of Extremity Soft Tissue Sarcoma. Sarcoma 2011: 289673, 2011.22190861

## Diagnosis of Lymphedema

### Signs, Symptoms, and Physical Examination

Lymphedema is typically evident by clinical findings such as unilateral, nonpitting edema, usually with involvement of the digits, in a patient with known risk factors (e.g., a breast cancer patient with previous axillary dissection). Other causes of limb swelling, including deep venous thrombosis, malignancy, and infection, should be considered in the differential diagnosis and excluded with appropriate studies, if indicated.

Lymphedema in patients with head and neck cancer can present slightly differently. External lymphedema does show swelling in the head and neck area, but internal lymphedema does not. Instead, patients with lymphedema related to internal head and neck cancer can present with complaints of voice changes, dysphagia, and possible difficulty breathing.

### Diagnostic Testing

#### Limb measurements

The wide variety of methods for evaluating limb volume and lack of standardization make it difficult for the clinician to assess the at-risk limb. Options include water displacement, tape measurement, infrared scanning, and bioelectrical impedance measures.[1]

The most common method for diagnosing upper-extremity lymphedema is circumferential upper-extremity measurement using specific anatomical landmarks.[2] Arm circumference measurements are used to estimate volume differences between the affected and unaffected arms. Sequential measurements are taken at four points on both arms: the metacarpal-phalangeal joints, the wrist, 10 cm distal to the lateral epicondyles, and 15 cm proximal to the lateral epicondyles. Differences of 2 cm or more at any point compared with the unaffected arm are considered by some experts to be clinically significant. However, measuring specific differences between arms may have limited clinical relevance because of implications, such as a 3-cm difference between the arm of an obese woman and the arm of a thin woman. In addition, there can be inherent anatomical variations in circumference between the dominant and nondominant limb related to differences in muscle mass. In addition, variations after breast cancer treatment may occur with atrophy of the ipsilateral arm or hypertrophy of the contralateral arm.[3] A small study comparing various methods of assessing upper-limb lymphedema did not show superiority of any one method.[1] Sequential measurements over time, including pretreatment measurements, may prove to be more clinically meaningful.

The water displacement method is another way to evaluate arm edema. A volume difference of 200 mL or more between the affected and opposite arms is typically considered to be a cutoff point to define lymphedema.[4]

#### Magnetic resonance lymphography (MRL)

This technique involves the intracutaneous injection of a paramagnetic contrast agent, followed by imaging of the lymphatic anatomy, dermal flow patterns, and adjacent fatty tissue. One study of 50 women with breast cancer–related lymphedema compared the lymphatic vessel morphology in their affected and unaffected arms.[5][Level of evidence: II] The lymphedema was staged according to the ISL's 2016 staging system.[6][Level of evidence: IV] In all patients, the lymph fluid was in the subcutis but not the subfascial compartment of the affected arm. In stage I patients, the lymphatics were tortuous and dilated, but there was no dermal backflow or regeneration of the lymphatics. In stage II patients, there was soft tissue fibrosis and adipose tissue hypertrophy. The lymphatics were tortuous and dilated, with areas of dermal backflow and regeneration. In stage III patients, the lymphatics were unrecognizable, and there was confluent dermal backflow. The soft tissue fibrosis was more advanced. MRL is safe, feasible, and provides high anatomical detail. However, its role in lymphedema diagnosis remains to be determined.

#### Staging and grading of severity

The staging system of the ISL reflects likely changes over time based on the pathophysiology of lymphedema. The stages include the following:

- Stage 0: This stage, referred to as subclinical lymphedema, is characterized by impaired lymph flow.
- Stage I: This stage is spontaneously reversible and typically marked by pitting edema, an increase in upper-extremity girth, and heaviness.
- Stage II: This moderate stage is characterized by a spongy consistency of the tissue without signs of pitting edema. Tissue fibrosis can then cause the limbs to harden and increase in size.[2] The swelling at this stage is mostly fluid.
- Stage III: In the most advanced stage,[2] swelling is mostly secondary to fat hypertrophy, so there is no pitting edema.

The severity of lymphedema may be evaluated using the Common Terminology Criteria for Adverse Events (CTCAE), which was developed for grading adverse events in the context of clinical trials.[7] A key advantage of the CTCAE approach is that it includes both objective measures (interlimb discrepancy) and subjective clinical assessments in diagnosing lymphedema. This approach allows the clinician to address troublesome signs and symptoms that may occur without significant interlimb discrepancy. The CTCAE volume 3 criteria are:

- Grade 1: 5% to 10% interlimb discrepancy in volume or circumference at point of greatest visible difference; swelling or obscuration of anatomical architecture on close inspection; pitting edema.
- Grade 2: More than 10% to 30% interlimb discrepancy in volume or circumference at point of greatest visible difference; readily apparent obscuration of anatomical architecture; obliteration of skin folds; readily apparent deviation from normal anatomical contour.
- Grade 3: More than 30% interlimb discrepancy in volume; lymphorrhea; gross deviation from normal anatomical contour; interference with activities of daily living (ADL).
- Grade 4: Progression to malignancy (e.g., lymphangiosarcoma); amputation indicated; disabling lymphedema.

The fifth version of the CTCAE is more streamlined and does not include limb volumes:[8]

- Grade 1: Trace thickening or faint discoloration.
- Grade 2: Marked discoloration; leathery skin texture; papillary formation; limitation in instrumental ADL.
- Grade 3: Severe symptoms; limitation in self-care ADL.

### References

Ridner SH, Montgomery LD, Hepworth JT, et al.: Comparison of upper limb volume measurement techniques and arm symptoms between healthy volunteers and individuals with known lymphedema. Lymphology 40 (1): 35-46, 2007.17539463
Bicego D, Brown K, Ruddick M, et al.: Exercise for women with or at risk for breast cancer-related lymphedema. Phys Ther 86 (10): 1398-405, 2006.17012644
Petrek JA: Commentary: prospective trial of complete decongestive therapy for upper extremity lymphedema after breast cancer therapy. Cancer J 10 (1): 17-9, 2004.
Mondry TE, Riffenburgh RH, Johnstone PA: Prospective trial of complete decongestive therapy for upper extremity lymphedema after breast cancer therapy. Cancer J 10 (1): 42-8; discussion 17-9, 2004 Jan-Feb.15000494
Sheng L, Zhang G, Li S, et al.: Magnetic Resonance Lymphography of Lymphatic Vessels in Upper Extremity With Breast Cancer-Related Lymphedema. Ann Plast Surg 84 (1): 100-105, 2020.31261176
Executive Committee: The Diagnosis and Treatment of Peripheral Lymphedema: 2016 Consensus Document of the International Society of Lymphology. Lymphology 49 (4): 170-84, 2016.29908550
Cheville AL, McGarvey CL, Petrek JA, et al.: The grading of lymphedema in oncology clinical trials. Semin Radiat Oncol 13 (3): 214-25, 2003.12903011
National Cancer Institute: Common Terminology Criteria for Adverse Events (CTCAE), Version 5.0. Bethesda, Md: U.S. Department of Health and Human Services, National Institutes of Health, 2017. Available online (https://ctep.cancer.gov/protocolDevelopment/electronic_applications/docs/CTCAE_v5_Quick_Reference_8.5x11.pdf). Last accessed Dec. 18, 2024.

## Prevention and Treatment Options Overview for Lymphedema

There are many potential interventions to reduce the risk of lymphedema or ameliorate its negative consequences. In general, the prevention and treatment interventions may be divided into nonsurgical and surgical approaches. Nonsurgical interventions may be further divided into pharmacological, compressive, or exercise related. Conservative options should be tried and exhausted prior to considering surgical options. This section provides an overview of the various interventions, followed by a more detailed analysis of individual trials based on the type of cancer.

### Nonsurgical Options

#### Compression garments

Compression garments are used to prevent and treat lymphedema by helping to decrease excess formation of interstitial fluid, prevent reflux of lymphatic fluid, and give a barrier to help muscle pumping of fluid up the lymphatic system.[1][Level of evidence: I] Use of flat knit (inelastic) compression garments is better than elastic compression in both the reduction and maintenance phase of stages II and III lymphedema. Inelastic compression garments allow the lymph fluid to be better propelled through the impaired lymphatic system via skeletal muscles. Flat knit garments also have the advantage of applying pressure to firm and soften edema. This pressure is applied at a uniform gradient over a large area. Circular knit garments deliver more pressure in the distal (narrow) part of the garment and are better for venous insufficiency than lymphedema.

Elastic garments are best used for stage I lymphedema and lymphedema that has been converted to stage II after complete decongestive therapy (CDT).

#### Intermittent external pneumatic compression

This approach should be used in conjunction with compression garments and only if compression is not enough to prevent or treat lymphedema. Concerns regarding the use of intermittent pneumatic compression include the optimum amount of pressure, treatment schedule, and the need for maintenance therapy after the initial reduction in edema.[2][Level of evidence: I] There is a theoretical concern that pressures higher than 60 mm Hg and long-term use may injure lymphatic vessels.

Intermittent external pneumatic compression may improve lymphedema management when used adjunctively with decongestive lymphatic therapy. A small randomized trial of 23 women with new breast cancer–associated lymphedema found an additional significant volume reduction, compared with manual lymphatic drainage alone (45% vs. 26%).[3][Level of evidence: I] Similarly, improvements were also found in the maintenance phase of therapy.

There are several barriers to multidisciplinary decongestive therapy, including cost, inadequate number of trained therapists, and time commitment. In response to these barriers, a group of researchers conducted a trial of a garment under commercial development.[4] The device was fit to patients, who were instructed to use it twice daily for 8 weeks. The investigators randomly assigned subjects to the device group or a wait-list control group. Use of the device was feasible, although most subjects found twice a day too burdensome. The treated subjects reported greater perceived ability to control lymphedema and subjectively had less swelling. There were no serious adverse events related to device usage. The economic costs of advanced compressive devices in lymphedema related to venous insufficiency compared favorably with other compressive techniques in a study of claims data.[5]

#### Complete decongestive therapy (CDT)

CDT is the standard of care for stage II lymphedema. However, the optimal program has not been established.

CDT has two phases:

- Phase 1—Decongestion/reduction: Skin/wound care, exercise, manual lymphatic drainage, and compression bandages, performed daily for an average of 15 days.
- Phase 2—Maintenance: Skin/wound care, exercise, manual lymphatic drainage as needed, and compression garments.

One study compared manual lymphatic drainage with exercise to treat lymphedema in 39 people with oral cavity cancer.[6] Exercise and manual lymphatic drainage each improved neck range of motion and controlled lymphedema, but they appeared to have a better effect when done together.

A systematic review of manual lymphatic drainage in patients with breast cancer reported on ten studies.[7] Four of the studies reported that manual lymphatic drainage could reduce the incidence of lymphedema (risk ratio, 0.58; 95% confidence interval [CI], 0.37–0.93). However, seven of the studies did not show a statistical difference in volumetric changes. They did see a statistical difference in pain control, but not in quality of life.

#### Physical exercise

Physical exercise may be valuable in the treatment of lymphedema for several reasons, including improvement in lymph flow from muscle contractions and overall cardiovascular function.[8] Conversely, early concerns that exercise may cause harm have not been confirmed.[9,10] Results from a small randomized study suggest that resistance exercise may be offered concurrently with CDT.[11][Level of evidence: I]

A systematic review and meta-analysis reported on 12 prevention and 36 treatment studies of exercise to either prevent or treat cancer-related lymphedema.[8] Most studies (11 of 12 and 32 of 36) enrolled patients with breast cancer. In addition, while most studies investigated some form of resistance training, a few used aerobic exercise alone. The relative risk of developing lymphedema after exercise was 0.90 (95% CI, 0.72–1.13), which was not significant. However, there was a suggested benefit in patients who had more than five lymph nodes removed. In this case, the relative risk was 0.49 (95% CI, 0.28–0.85). For patients in the treatment studies, the standardized mean difference (SMD) in measured outcomes was −0.11 (95% CI, −0.22 to 0.01). The difference compared with the control condition was −0.10 (95% CI, −0.24 to 0.04). Significant differences were detected for discrete outcomes such as pain, upper-body function and strength, lower-body strength, fatigue, and quality of life for those in the exercise group (SMD, 0.3–0.8; P < .05).

The American College of Sports Medicine advises that a supervised, progressive resistance exercise program is safe for patients with or at risk for lymphedema after breast cancer. There is not adequate data about the safety of unsupervised exercise. The safety of exercise in other cancers is unknown.[12][Level of evidence: IV]

#### Pharmacological therapy

##### Nonsteroidal anti-inflammatory drugs (NSAIDs)

The potential benefit of the NSAID ketoprofen on lymphedema was demonstrated in a pair of small trials.[13] The rationale for the use of NSAIDs rests on observations of histopathological inflammatory changes in the affected tissue and a possible relationship between persistent inflammation and impaired lymphangiogenesis. The authors reported an open-label trial, followed by a small placebo-controlled trial. In the latter, 18 patients were treated with placebo and 16 patients were treated with ketoprofen for 4 months. In both trials, ketoprofen treatment led to a significant reduction in skin thickness and an improvement in the histopathological appearance of the skin. In neither trial, however, were there changes in limb volume or skin impedance. These promising early results require verification, given the potential gastrointestinal and cardiovascular risks of NSAIDs.

### Surgical Options

The surgical options for the treatment of lymphedema include lymphatico-venous anastomoses (LVA), vascularized lymph node transplantation (VLNT), and reduction of excess tissue volume by excision of liposuction. Several informative reviews describe the surgical decision making involved in selecting patients and the type of operation.[14]

There are limited data to guide the choice between liposuction and microsurgical techniques, and some investigators propose a combined approach.[15] The choice of microsurgical techniques may be aided by imaging and clinical grading of lymphedema severity. One proposal suggests that patients are candidates for LVA if they have partial obstruction seen on lymphoscintigraphy and grade 1 or 2 lymphedema with patent lymphatic ducts observed on indocyanine green lymphography . On the other hand, VLNT may be better for patients exhibiting a total obstruction seen on lymphoscintigraphy and grade 3 or 4 lymphedema without patent lymphatic ducts observed on indocyanine green lymphography.[16]

#### Lymphatico-venous anastomosis

LVA surgery is typically used in patients with early-grade lymphedema due to difficulties in finding lymphatic vessels. One study reported results for 42 patients with later-grade, lower-extremity lymphedema who underwent preoperative magnetic resonance lymphangiography and ultrasound.[17] The imaging allowed patients to have an average of five successful anastomoses per limb. Clinical outcomes were favorable, raising the possibility of expanded indications for this surgery.

Immediate lymphatic reconstruction at the time of cancer surgery is under active investigation.

#### Vascularized lymph node transfer

VLNT involves harvesting healthy lymph nodes and their relevant venous and arterial vessels from a donor site and transferring them to the nodal basin of the affected extremity. The proposed mechanisms of action include providing alternative routes of lymphatic drainage and encouraging lymphangiogenesis to provide new lymph vessels to the extremity. At present, there is scant but promising clinical data on the efficacy of VLNT.[18]

A systematic review and summary of patients with breast cancer–related lymphedema who underwent CDT or VLNT [19] examined the evidence that both interventions favorably impact health-related quality of life measures. As anticipated, the data for VLNT was more limited (two studies, 65 patients) than for CDT (14 studies, 569 patients). However, within these limits, the data for VLNT indicated that improvements were commonly seen. The data for CDT were more heterogenous, and the improvement was often less significant. These data give clinicians a reason to consider surgical intervention, although at present the standard practice seems to be CDT.

In a retrospective study of 124 patients with breast cancer–related lymphedema, the degree of improvement in limb circumference and reduction in episodes of cellulitis appeared to be greater in patients who underwent VLNT than in those who underwent LVA.[16] In addition to the usual caution in interpreting retrospective data, the patients who underwent VLNT were ineligible for LVA based on lymphography results. This finding seems to support the use of imaging to guide patient selection. Two small cohort studies of VLNT in patients with breast cancer demonstrated apparent improvements in objective limb measurements and subjective measures of patients’ health-related quality of life.[20][Level of evidence: III]; [21][Level of evidence: II]

#### Liposuction

Nonpitting chronic lymphedema may be due to adipose tissue hypertrophy. In this case, liposuction to remove the excess adipose tissue is an option. Compression garments are still needed after the liposuction. In addition, excision of the redundant skin after liposuction may be required.[22]

One retrospective study compared the frequency of documented episodes of erysipelas in 130 patients before and after they underwent liposuction.[23] As anticipated, the mean excess arm volume decreased from 1,607 mL to negative 43 mL, and the ratio of affected to normal arm decreased from 1.5 to 1.0. The recorded occurrence of erysipelas decreased from 0.47 to 0.06 attacks per year. Similar results were reported in another study,[24] in which the authors reviewed the charts of 105 women with breast cancer–related lymphedema refractory to compressive therapies who underwent liposuction between 1993 and 2012. Notably, patients had to have nonpitting edema. All women benefited, and the benefit persisted for at least 5 years by measurement.

#### Laser therapy

Low-level laser therapy (LLT) is a noninvasive technique in which affected tissues receive phototherapy of various wavelengths within 650 to 1,000 nanometers. The role of LLT in the care of people with lymphedema is not established, although a 2017 systematic review found promising evidence.[25] The proposed mechanisms of action include cellular proliferation of macrophages with reduction in fibrosis, reduced inflammatory mediators, lymphangiogenesis, and improved lymphatic flow.[25] In addition, carbon dioxide laser treatment may also lead to clinical improvements, though the data are currently only from small case series.[26] The carbon dioxide laser stimulates remodeling of abnormal collagen by matrix metalloproteinases and dermal neocollagenesis by fibroblasts and supports generation of new lymphatic vessels.

### References

Nadal Castells MJ, Ramirez Mirabal E, Cuartero Archs J, et al.: Effectiveness of Lymphedema Prevention Programs With Compression Garment After Lymphatic Node Dissection in Breast Cancer: A Randomized Controlled Clinical Trial. Front Rehabil Sci 2: 727256, 2021.36188772
Dini D, Del Mastro L, Gozza A, et al.: The role of pneumatic compression in the treatment of postmastectomy lymphedema. A randomized phase III study. Ann Oncol 9 (2): 187-90, 1998.9553664
Szuba A, Achalu R, Rockson SG: Decongestive lymphatic therapy for patients with breast carcinoma-associated lymphedema. A randomized, prospective study of a role for adjunctive intermittent pneumatic compression. Cancer 95 (11): 2260-7, 2002.12436430
Ridner SH, Dietrich MS, Deng J, et al.: Advanced pneumatic compression for treatment of lymphedema of the head and neck: a randomized wait-list controlled trial. Support Care Cancer 29 (2): 795-803, 2021.32488435
Lerman M, Gaebler JA, Hoy S, et al.: Health and economic benefits of advanced pneumatic compression devices in patients with phlebolymphedema. J Vasc Surg 69 (2): 571-580, 2019.29914829
Tsai KY, Liao SF, Chen KL, et al.: Effect of early interventions with manual lymphatic drainage and rehabilitation exercise on morbidity and lymphedema in patients with oral cavity cancer. Medicine (Baltimore) 101 (42): e30910, 2022.36281150
Lin Y, Yang Y, Zhang X, et al.: Manual Lymphatic Drainage for Breast Cancer-related Lymphedema: A Systematic Review and Meta-analysis of Randomized Controlled Trials. Clin Breast Cancer 22 (5): e664-e673, 2022.35370085
Hayes SC, Singh B, Reul-Hirche H, et al.: The Effect of Exercise for the Prevention and Treatment of Cancer-Related Lymphedema: A Systematic Review with Meta-analysis. Med Sci Sports Exerc 54 (8): 1389-1399, 2022.35320145
Schmitz KH, Ahmed RL, Troxel A, et al.: Weight lifting in women with breast-cancer-related lymphedema. N Engl J Med 361 (7): 664-73, 2009.19675330
Singh B, Disipio T, Peake J, et al.: Systematic Review and Meta-Analysis of the Effects of Exercise for Those With Cancer-Related Lymphedema. Arch Phys Med Rehabil 97 (2): 302-315.e13, 2016.26440777
Do JH, Kim W, Cho YK, et al.: EFFECTS OF RESISTANCE EXERCISES AND COMPLEX DECONGESTIVE THERAPY ON ARM FUNCTION AND MUSCULAR STRENGTH IN BREAST CANCER RELATED LYMPHEDEMA. Lymphology 48 (4): 184-96, 2015.27164764
Campbell KL, Winters-Stone KM, Wiskemann J, et al.: Exercise Guidelines for Cancer Survivors: Consensus Statement from International Multidisciplinary Roundtable. Med Sci Sports Exerc 51 (11): 2375-2390, 2019.31626055
Rockson SG, Tian W, Jiang X, et al.: Pilot studies demonstrate the potential benefits of antiinflammatory therapy in human lymphedema. JCI Insight 3 (20): , 2018.30333315
Schaverien MV, Coroneos CJ: Surgical Treatment of Lymphedema. Plast Reconstr Surg 144 (3): 738-758, 2019.31461041
Forte AJ, Boczar D, Huayllani MT, et al.: Pharmacotherapy Agents in Lymphedema Treatment: A Systematic Review. Cureus 11 (12): e6300, 2019.31815082
Engel H, Lin CY, Huang JJ, et al.: Outcomes of Lymphedema Microsurgery for Breast Cancer-related Lymphedema With or Without Microvascular Breast Reconstruction. Ann Surg 268 (6): 1076-1083, 2018.28594742
Cha HG, Oh TM, Cho MJ, et al.: Changing the Paradigm: Lymphovenous Anastomosis in Advanced Stage Lower Extremity Lymphedema. Plast Reconstr Surg 147 (1): 199-207, 2021.33009330
Gould DJ, Mehrara BJ, Neligan P, et al.: Lymph node transplantation for the treatment of lymphedema. J Surg Oncol 118 (5): 736-742, 2018.30129675
Fish ML, Grover R, Schwarz GS: Quality-of-Life Outcomes in Surgical vs Nonsurgical Treatment of Breast Cancer-Related Lymphedema: A Systematic Review. JAMA Surg 155 (6): 513-519, 2020.32347903
Aljaaly HA, Fries CA, Cheng MH: Dorsal Wrist Placement for Vascularized Submental Lymph Node Transfer Significantly Improves Breast Cancer-Related Lymphedema. Plast Reconstr Surg Glob Open 7 (2): e2149, 2019.30881845
Gratzon A, Schultz J, Secrest K, et al.: Clinical and Psychosocial Outcomes of Vascularized Lymph Node Transfer for the Treatment of Upper Extremity Lymphedema After Breast Cancer Therapy. Ann Surg Oncol 24 (6): 1475-1481, 2017.27734176
Chen WF, Zeng WF, Hawkes PJ, et al.: Lymphedema Liposuction with Immediate Limb Contouring. Plast Reconstr Surg Glob Open 7 (11): e2513, 2019.31942304
Lee D, Piller N, Hoffner M, et al.: Liposuction of Postmastectomy Arm Lymphedema Decreases the Incidence of Erysipelas. Lymphology 49 (2): 85-92, 2016.29906366
Hoffner M, Ohlin K, Svensson B, et al.: Liposuction Gives Complete Reduction of Arm Lymphedema following Breast Cancer Treatment-A 5-year Prospective Study in 105 Patients without Recurrence. Plast Reconstr Surg Glob Open 6 (8): e1912, 2018.30324078
Baxter GD, Liu L, Petrich S, et al.: Low level laser therapy (Photobiomodulation therapy) for breast cancer-related lymphedema: a systematic review. BMC Cancer 17 (1): 833, 2017.29216916
Menzer C, Aleisa A, Wilson BN, et al.: Efficacy of laser CO2 treatment for refractory lymphedema secondary to cancer treatments. Lasers Surg Med 54 (3): 337-341, 2022.34837392

## Disease-Specific Interventions for Prevention or Treatment of Lymphedema

### Breast Cancer: Prevention of Lymphedema

#### Compression garments

A randomized study of women who underwent an axillary dissection suggested that compression sleeves worn from the first postoperative day until 3 months after completion of adjuvant therapy reduced the risk of lymphedema.[1][Level of evidence: I] Women (n = 155) who were randomly assigned to the compression intervention had less arm swelling, as determined by bioimpedance spectroscopy (BIS) thresholds and relative arm volume increase (RAVI), than women assigned to usual care. The cumulative incidence of arm swelling at 1 year was 42% by BIS and 14% by RAVI in women who received compression garments, compared with 52% and 25%, respectively, for usual care. The hazard ratio for developing arm swelling in the compression group relative to the control group was 0.61 (95% confidence interval, 0.43–0.85; P = .004) by BIS and 0.56 (95% CI, 0.33–0.96; P = .034) by RAVI. There were no differences in patient-reported outcomes.

#### Exercise

A randomized trial suggested that exercise might help prevent lymphedema after breast cancer surgery.[2][Level of evidence: I] The investigators randomly assigned 77 eligible women to a control arm or to 12 months of gym membership with a 13-week training session in weightlifting. Eligibility criteria included a diagnosis of breast cancer within 1 to 5 years, at least two lymph nodes removed, a body mass index (BMI) of less than 50, no prior history of lymphedema, and no asymmetry in the arms greater than 10%. The primary outcome was an increase in affected arm volume of greater than 5% at 1 year. A secondary outcome was clinician-defined lymphedema. The percentages of women who met the criteria for the primary outcome in the control and weightlifting cohorts were 17% and 11%, respectively (P = .04). The reduction in the rate in women who had five or more lymph nodes removed was even greater (22% in the control cohort vs. 7% in the weightlifting cohort; P = .003). However, there were no differences in the rates of clinician-defined lymphedema, which were much lower in each arm (4.4% in the control cohort vs. 1.5% in the weightlifting cohort).

A 2021 randomized trial studied patients with breast cancer who underwent either an axillary or sentinel lymph node dissection.[3][Level of evidence: I] The investigators randomly assigned 568 women to one of two groups. All subjects met with a trained lymphedema prevention educator and received information about lymphedema, including preventive self-care practices. The 315 women receiving the active intervention met with a physical therapist who provided an individual exercise program, weights, and an elastic compression sleeve to wear. The primary end point was the lymphedema-free rate at 18 months. Lymphedema was defined by either an increase in volume of the affected extremity of more than 10% or a doctor’s diagnosis. There were no differences between groups in the primary end point. Overall, 69% of participants in the education-only arm and 70% in the intervention arm were free of lymphedema at 18 months. But adherence in the intervention arm was poor (less than 50%) due to time constraints and a perceived lack of benefit. There were no differences in health-related quality of life between the cohorts.[4]

At present, exercise therapy with compression garments may not effectively prevent lymphedema. Exercise with other interventions has been investigated. For example, one study reported the results of a randomized trial of manual lymphatic drainage in addition to exercise therapy in preventing lymphedema.[5][Level of evidence: I] The investigators randomly assigned 160 women to receive or not receive manual lymphatic drainage in addition to exercise and suggestions to minimize lymphedema. Participants underwent serial volume measurements. At 6 months, 24% of women in the intervention group and 19% in the control group had an increase in volume of greater than 200 mL.

### Breast Cancer: Treatment of Lymphedema

#### Complete decongestive therapy (CDT)

Compression sleeves alone may prevent progression of less severe lymphedema, but women often need more intensive interventions.[6][Level of evidence: I] In one study, 103 women had post–breast cancer lymphedema that caused at least a 10% increase in volume in the affected arm compared with the unaffected arm. Participants were randomly assigned to either CDT comprising elastic compression garments plus 20 daily manual lymphatic drainage sessions with a trained therapist (n = 57) or elastic compression garments alone (n = 46).[7][Level of evidence: I] The primary outcome was the percentage change in excess arm volume from baseline to 6 weeks. The women assigned to CDT experienced greater absolute volume loss than the women treated with compression garments alone (250 mL vs. 143 mL). However, there were no differences in the mean reduction of excess arm volume between the groups due to baseline differences in arm volumes in the two cohorts. In addition, there were no differences in the secondary outcomes and arm function.

#### Physical exercise

The results of randomized trials of physical exercise compared with usual care do not consistently demonstrate a benefit for patients with breast cancer and lymphedema. One study showed that women who underwent wide excision and axillary dissection and were randomly assigned to a supervised exercise program (3 hours per week for 12 weeks) reported fewer lymphedema-related symptoms than women assigned to a control group.[8][Level of evidence: I] The exercise group demonstrated greater reduction in extracellular fluid, as assessed with bioimpedance spectroscopy, compared with the control group. There was no significant difference in dermal thickness of the breast, as assessed by ultrasound.

Based on promising results of a facility-based exercise intervention, one trial used a 2 x 2 factorial design to test a home-based exercise program, with or without a weight-loss intervention led by a dietitian.[9][Level of evidence: I] The investigators randomly assigned 351 eligible women into one of four groups: control (n = 90), exercise alone (n = 87), weight loss alone (n = 87), and combined exercise and weight loss (n = 87). All patients received compression garments and consultations with certified lymphedema therapists. Eligibility criteria included evidence of lymphedema by clinical exam or history of lymphedema more than 6 months after surgery, a BMI between 25 and 50, and the ability to exercise but no history of consistent exercising. The primary outcome was the percentage difference between affected and nonaffected limbs. Secondary outcomes included clinician evaluation, patient surveys, and rates of lymphedema exacerbation or cellulitis. There were no differences of note between the various groups in the outcomes. This result raises the possibility that home-based therapies are inferior to facility-based treatment. The role of weight loss, if any, remains to be further elucidated.

#### Lymph node transplantation

A randomized trial of microsurgical lymph node transplantation and compression-physiotherapy versus compression-physiotherapy alone was reported.[10][Level of evidence: I] The 18 patients who underwent surgery had a greater reduction in limb volume (57% vs. 18%), fewer infectious complications from the lymphedema, and improved symptoms and functional status, compared with patients who received only compression-physiotherapy. The authors estimated that the procedure was cost effective when accounting for the reduction in complications from lymphedema.

### Cervical Cancer: Prevention of Lymphedema

One study enrolled 120 women with cervical cancer who underwent a laparoscopic radical hysterectomy with pelvic lymphadenectomy. Participants were randomly assigned to an education-alone intervention or a CDT intervention.[11][Level of evidence: I] The CDT consisted of training in manual lymphatic drainage, followed by self-administered manual lymphatic drainage at home, compression hosiery, and an aerobic exercise program. The interventions were initiated 7 to 10 days after surgery. Additional eligibility criteria included more than 20 lymph nodes removed or anticipated radiation therapy (both of which are risk factors for lower-extremity lymphedema after surgery for cervical cancer). The primary outcome was limb volume calculated from multiple circumference measurements. Secondary outcomes included patients' self-reported symptoms related to lymphedema. After a follow-up of 1 year, 20 of 58 patients (24%) in the control arm and 8 of 59 (14%) in the CDT arm developed lymphedema (P = .008). The excess volume was less in the experimental arm as well. However, there were no differences in patient-reported symptoms or severity grading of the lymphedema. These promising results were supported by a smaller pilot study[12] and a retrospective review of a single-institution experience with women who developed lymphedema after treatment of a variety of gynecological cancers.[13]

### Head and Neck Cancer: Treatment of Lymphedema

#### Systematic review

A systematic review examined publications related to lymphedema treatment in patients who had been treated for head and neck cancers.[14] The authors identified 23 primary studies, including 14 cohort studies, 7 case reports, and 2 randomized controlled trials. The interventions included manual lymphatic drainage, acupuncture, selenium supplementation, and liposuction.

#### CDT

A small randomized trial in patients with lymphedema after surgery for head and neck cancer assigned 21 patients to one of three groups: control (n = 7), CDT (n = 7), and home-based therapy (n = 7).[15] The patients who received home-based therapy were taught manual lymphatic drainage techniques. The patients who received CDT wore a compression face mask and received manual lymphatic drainage from a trained therapist; the time commitment was significant. Patients in the CDT group experienced greater volume reduction and no fibrotic complications. The small sample size and the time commitment required to receive CDT suggested the effect should be verified in a larger study before wider adoption.

#### Advanced pneumatic compression device

The shortage of trained lymphedema therapists and the inconvenience of multiple clinic visits have encouraged the development of a device patients can use at home. In a small randomized trial of such a device, patients were assigned to the device (n = 24) or a wait-list control (n = 25).[16] At 8 weeks, subjects in the active treatment arm reported less distressing symptoms, and repeat endoscopic exams revealed less edema, compared with the control subjects. Assessments of function were not changed. The authors noted that patients tended to use the device once daily rather than the prescribed twice daily. Further study is required.

#### Liposuction

There is a small randomized trial of submental liposuction in patients who complained of swelling after treatment of head and neck cancer. The ten patients who underwent liposuction reported greater improvements in personal appearance, compared with control subjects, at 6 months. No adverse effects from liposuction were reported.[17][Level of evidence: I]

### Sarcoma of the Extremity: Prevention of Lymphedema

One study compared the incidence of lymphedema in a cohort of eight patients with thigh sarcoma, who had lymphatico-venous anastomoses performed in combination with resection of thigh soft-tissue tumors, with a historical cohort of 20 patients.[18] Only one of eight patients experienced lymphedema, compared with nine patients in the historical cohort. Patient self-reported symptoms were uncommon in the eight patients.

### References

Paramanandam VS, Dylke E, Clark GM, et al.: Prophylactic Use of Compression Sleeves Reduces the Incidence of Arm Swelling in Women at High Risk of Breast Cancer-Related Lymphedema: A Randomized Controlled Trial. J Clin Oncol 40 (18): 2004-2012, 2022.35108031
Schmitz KH, Ahmed RL, Troxel AB, et al.: Weight lifting for women at risk for breast cancer-related lymphedema: a randomized trial. JAMA 304 (24): 2699-705, 2010.21148134
Paskett ED, Le-Rademacher J, Oliveri JM, et al.: A randomized study to prevent lymphedema in women treated for breast cancer: CALGB 70305 (Alliance). Cancer 127 (2): 291-299, 2021.33079411
Naughton MJ, Liu H, Seisler DK, et al.: Health-related quality of life outcomes for the LEAP study-CALGB 70305 (Alliance): A lymphedema prevention intervention trial for newly diagnosed breast cancer patients. Cancer 127 (2): 300-309, 2021.33079393
Devoogdt N, Geraerts I, Van Kampen M, et al.: Manual lymph drainage may not have a preventive effect on the development of breast cancer-related lymphoedema in the long term: a randomised trial. J Physiother 64 (4): 245-254, 2018.30241913
Blom KY, Johansson KI, Nilsson-Wikmar LB, et al.: Early intervention with compression garments prevents progression in mild breast cancer-related arm lymphedema: a randomized controlled trial. Acta Oncol 61 (7): 897-905, 2022.35657063
Dayes IS, Whelan TJ, Julian JA, et al.: Randomized trial of decongestive lymphatic therapy for the treatment of lymphedema in women with breast cancer. J Clin Oncol 31 (30): 3758-63, 2013.24043733
Kilbreath SL, Ward LC, Davis GM, et al.: Reduction of breast lymphoedema secondary to breast cancer: a randomised controlled exercise trial. Breast Cancer Res Treat 184 (2): 459-467, 2020.32812177
Schmitz KH, Troxel AB, Dean LT, et al.: Effect of Home-Based Exercise and Weight Loss Programs on Breast Cancer-Related Lymphedema Outcomes Among Overweight Breast Cancer Survivors: The WISER Survivor Randomized Clinical Trial. JAMA Oncol 5 (11): 1605-1613, 2019.31415063
Dionyssiou D, Demiri E, Tsimponis A, et al.: A randomized control study of treating secondary stage II breast cancer-related lymphoedema with free lymph node transfer. Breast Cancer Res Treat 156 (1): 73-9, 2016.26895326
Wang X, Ding Y, Cai HY, et al.: Effectiveness of modified complex decongestive physiotherapy for preventing lower extremity lymphedema after radical surgery for cervical cancer: a randomized controlled trial. Int J Gynecol Cancer 30 (6): 757-763, 2020.32107315
Shallwani SM, Towers A, Newman A, et al.: Feasibility of a Pilot Randomized Controlled Trial Examining a Multidimensional Intervention in Women with Gynecological Cancer at Risk of Lymphedema. Curr Oncol 28 (1): 455-470, 2021.33450972
Liao SF, Li SH, Huang HY: The efficacy of complex decongestive physiotherapy (CDP) and predictive factors of response to CDP in lower limb lymphedema (LLL) after pelvic cancer treatment. Gynecol Oncol 125 (3): 712-5, 2012.22426250
Tyker A, Franco J, Massa ST, et al.: Treatment for lymphedema following head and neck cancer therapy: A systematic review. Am J Otolaryngol 40 (5): 761-769, 2019.31174933
Ozdemir K, Keser I, Duzlu M, et al.: The Effects of Clinical and Home-based Physiotherapy Programs in Secondary Head and Neck Lymphedema. Laryngoscope 131 (5): E1550-E1557, 2021.33111977
Ridner SH, Dietrich MS, Deng J, et al.: Advanced pneumatic compression for treatment of lymphedema of the head and neck: a randomized wait-list controlled trial. Support Care Cancer 29 (2): 795-803, 2021.32488435
Alamoudi U, Taylor B, MacKay C, et al.: Submental liposuction for the management of lymphedema following head and neck cancer treatment: a randomized controlled trial. J Otolaryngol Head Neck Surg 47 (1): 22, 2018.29580298
Wagner JM, Dadras M, Ufton D, et al.: Prophylactic lymphaticovenous anastomoses for resection of soft tissue tumors of the thigh to prevent secondary lymphedema-a retrospective comparative cohort analysis. Microsurgery 42 (3): 239-245, 2022.34951055

## Latest Updates to This Summary (12/18/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Overview

Added level of evidence I.

Disease-Specific Lymphedema

Added level of evidence II.

Added level of evidence II.

Added level of evidence II.

Diagnosis of Lymphedema

Added level of evidence II and level of evidence IV.

Prevention and Treatment Options Overview for Lymphedema

Added level of evidence I.

Added level of evidence I.

Added level of evidence IV.

Added level of evidence II and level of evidence III.

Disease-Specific Interventions for Prevention or Treatment of Lymphedema

Added level of evidence I.

Added level of evidence I.

Added level of evidence I.

Added level of evidence I.

Added level of evidence I.

Added level of evidence I.

Added level of evidence I.

Added level of evidence I.

Added level of evidence I.

Added level of evidence I.

This summary is written and maintained by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the diagnosis and treatment of lymphedema. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Supportive and Palliative Care Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/supportive-care), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Lymphedema are:

- Larry D. Cripe, MD (Indiana University School of Medicine)
- James T. Pastrnak, MD (Indiana University School of Medicine)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Supportive and Palliative Care Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Supportive and Palliative Care Editorial Board. PDQ Lymphedema. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/about-cancer/treatment/side-effects/lymphedema/lymphedema-hp-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389244]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

The information in these summaries should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).